# Thyroid Cancer Screening (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about thyroid cancer screening. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Screening and Prevention Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Overview

Note: The Overview section summarizes the published evidence on this topic. The rest of the summary describes the evidence in more detail.

Another PDQ summary on Thyroid Cancer Treatment is also available.

### Benefits

Based on solid evidence, screening for thyroid cancer does not result in a decrease in thyroid cancer mortality.

Magnitude of Effect: No evidence of benefit.

- Study Design: Ecological studies and analyses of changes in thyroid cancer incidence and mortality after screening adoption.
- Internal Validity: Good.
- Consistency: Good.
- External Validity: Good.

### Harms

Based on solid evidence, screening for thyroid cancer results in overdiagnosis and overtreatment. Treatment for thyroid cancer usually results in long-term and clinically relevant sequelae. Other known harms associated with thyroid cancer screening are psychological consequences of both false-positive tests and unnecessary diagnoses.

Magnitude of Effect: Moderate.

- Study Design: Ecological studies, analyses of changes in thyroid cancer incidence and mortality after screening adoption, and observational studies.
- Internal Validity: Good.
- Consistency: Good.
- External Validity: Good.

## Incidence and Mortality

In 2025, an estimated 44,020 new cases of thyroid cancer will be diagnosed in the United States, and an estimated 2,290 people will die of the disease.[1] Surveillance, Epidemiology, and End Results (SEER) Program data suggest that the incidence of thyroid cancer in women is about three times higher than the incidence of thyroid cancer in men (19.8 vs. 7.2 per 100,000 per year), although the mortality rate does not differ by sex (0.5 per 100,000 per year for both).[2] Nearly all cases of thyroid cancer are diagnosed at either the local stage (64%) or the regional stage (30%).[2] The 10-year relative survival rate is 98.3%.[2] Thyroid cancer represents about 2% of all new cancer diagnoses in the United States and 0.4% of all cancer deaths.[3] Thyroid cancer is most frequently diagnosed in people aged 45 to 64 years.[2] It was estimated that 979,295 people were living with thyroid cancer in the United States in 2021.[3]

About 95% of thyroid cancers are well differentiated.[4] Well-differentiated thyroid cancers include papillary thyroid cancers and follicular thyroid cancers, which represent 84% and 11% of all thyroid cancers, respectively.[4] Medullary and anaplastic thyroid cancers account for 2% and 1% of thyroid cancers, respectively.[4] Well-differentiated tumors are highly treatable and usually curable. For more information, see Thyroid Cancer Treatment. The 10-year relative survival rates for papillary and follicular cancers are 99% and 95%, respectively.[2] Although rare, anaplastic tumors have a poor prognosis, with a 10-year relative survival rate of 8%, and account for 20% of thyroid cancer deaths.[4]

Incidence rates of thyroid cancer in the United States have been rising for at least 40 years. From 1974 to 2013, the average annual rise in incidence was 3.6% (95% confidence interval [CI], 3.2%–3.9%), a change driven primarily by an increased incidence of papillary thyroid cancer (average annual percent change, 4.4%; 95% CI, 4.0%–4.7%).[4] This increasing trend appears to be changing in recent years, with indications of a plateau in the incidence rate from 2013 to 2016, and a decline in the incidence rate for thyroid tumors that were less than 1 cm in size.[5] A rise in incidence has also been seen in other countries, including the United Kingdom [6] and Nordic countries.[7,8] The greatest rise has been seen in South Korea, where the incidence of thyroid cancer in 2011 was 15 times what it was in 1993.[9] The rise in incidence tracks closely with the uptake of thyroid cancer screening in Korea.[9]

### References

American Cancer Society: Cancer Facts and Figures 2025. American Cancer Society, 2025. Available online (https://www.cancer.org/content/dam/cancer-org/research/cancer-facts-and-statistics/annual-cancer-facts-and-figures/2025/2025-cancer-facts-and-figures-acs.pdf). Last accessed January 16, 2025.
Surveillance Research Program, National Cancer Institute: SEER*Explorer: An interactive website for SEER cancer statistics. Bethesda, MD: National Cancer Institute. Available online (https://seer.cancer.gov/statistics-network/explorer/). Last accessed December 30, 2024.
National Cancer Institute: SEER Stat Fact Sheets: Thyroid Cancer. Bethesda, Md: National Cancer Institute. Available online (https://seer.cancer.gov/statfacts/html/thyro.html). Last accessed December 19, 2024.
Lim H, Devesa SS, Sosa JA, et al.: Trends in Thyroid Cancer Incidence and Mortality in the United States, 1974-2013. JAMA 317 (13): 1338-1348, 2017.28362912
Powers AE, Marcadis AR, Lee M, et al.: Changes in Trends in Thyroid Cancer Incidence in the United States, 1992 to 2016. JAMA 322 (24): 2440-2441, 2019.31860035
Cancer Research UK: Thyroid Cancer Incidence Statistics. London, UK: Cancer Research UK. Available online (http://www.cancerresearchuk.org/health-professional/cancer-statistics/statistics-by-cancer-type/thyroid-cancer/incidence#heading-Two). Last accessed December 19, 2024.
Mirian C, Grønhøj C, Jensen DH, et al.: Trends in thyroid cancer: Retrospective analysis of incidence and survival in Denmark 1980-2014. Cancer Epidemiol 55: 81-87, 2018.29852396
Carlberg M, Hedendahl L, Ahonen M, et al.: Increasing incidence of thyroid cancer in the Nordic countries with main focus on Swedish data. BMC Cancer 16: 426, 2016.27388603
Ahn HS, Welch HG: South Korea's Thyroid-Cancer "Epidemic"--Turning the Tide. N Engl J Med 373 (24): 2389-90, 2015.26650173

## Risk Factors

Radiation therapy administered in infancy or childhood for benign conditions of the head and neck (such as enlarged thymus, tonsils, or adenoids; or acne) increases the risk of thyroid cancer, with diagnosis occurring in as few as 5 years after exposure.[1] Radiation exposure as a consequence of nuclear fallout has also been associated with a high risk of thyroid cancer, especially in children.[2-4] Other risk factors include family history of thyroid disease (including thyroid cancer), history of enlarged thyroid (goiter), female sex, and Asian race.[5] A hereditary condition, multiple endocrine neoplasia type 2 (MEN2), increases the risk of medullary thyroid cancer caused by mutations in the RET gene.[6,7] For more information, see Genetics of Endocrine and Neuroendocrine Neoplasias.

### References

Carling T, Udelsman R: Thyroid tumors. In: DeVita VT Jr, Lawrence TS, Rosenberg SA: Cancer: Principles and Practice of Oncology. 9th ed. Lippincott Williams & Wilkins, 2011, pp 1457-72.
Pacini F, Vorontsova T, Molinaro E, et al.: Prevalence of thyroid autoantibodies in children and adolescents from Belarus exposed to the Chernobyl radioactive fallout. Lancet 352 (9130): 763-6, 1998.9737280 98407298
Cardis E, Kesminiene A, Ivanov V, et al.: Risk of thyroid cancer after exposure to 131I in childhood. J Natl Cancer Inst 97 (10): 724-32, 2005.15900042
Tronko MD, Howe GR, Bogdanova TI, et al.: A cohort study of thyroid cancer and other thyroid diseases after the chornobyl accident: thyroid cancer in Ukraine detected during first screening. J Natl Cancer Inst 98 (13): 897-903, 2006.16818853
Iribarren C, Haselkorn T, Tekawa IS, et al.: Cohort study of thyroid cancer in a San Francisco Bay area population. Int J Cancer 93 (5): 745-50, 2001.11477590 21369817
American Cancer Society: Cancer Facts and Figures 2025. American Cancer Society, 2025. Available online (https://www.cancer.org/content/dam/cancer-org/research/cancer-facts-and-statistics/annual-cancer-facts-and-figures/2025/2025-cancer-facts-and-figures-acs.pdf). Last accessed January 16, 2025.
Salvatore G, Giannini R, Faviana P, et al.: Analysis of BRAF point mutation and RET/PTC rearrangement refines the fine-needle aspiration diagnosis of papillary thyroid carcinoma. J Clin Endocrinol Metab 89 (10): 5175-80, 2004.15472223

## Evidence of No Benefit Associated With Screening

Screening for thyroid cancer is primarily accomplished by neck palpation or ultrasound imaging. In the absence of formal screening, asymptomatic thyroid cancers are most commonly detected incidentally on cross-sectional imaging performed for other medical conditions or on surgical specimens of benign diseases such as goiter.[1]

The efficacy of thyroid cancer screening has never been evaluated in a randomized controlled trial (RCT).[2] No RCTs of intermediate end points (e.g., changes in stage at diagnosis) have been conducted. No population-based screening programs for thyroid cancer exist in the United States, the United Kingdom, or Europe, although neck palpation screening results in incidental detection of asymptomatic cancers. Over time, U.S. and U.K. thyroid cancer incidence rates have increased, but thyroid cancer mortality has remained constant or decreased slightly.[3,4] That pattern is consistent with the detection of cancers that are not destined to cause symptoms or result in death (overdiagnosis).

In South Korea, thyroid cancer screening increased dramatically in conjunction with the 1999 establishment of a free national cancer screening program. Although not offered as part of the package of free screening exams, thyroid cancer screening with ultrasound was offered simultaneously at low cost in most clinics, and many South Koreans opted for the exams.[5] Thyroid cancer incidence in South Korea increased 15-fold from 1993 to 2011, although no change in thyroid cancer mortality occurred concurrently.[6] In 2011, the number of people diagnosed with thyroid cancer (40,000) was more than 100 times higher than the number who died of thyroid cancer (typically 300–400 each year, with little change in mortality rates since 1999).[6,7] The practice of thyroid cancer screening in South Korea began to wane in 2013 because of concerns about overdiagnosis and overtreatment. In 2015, the Korean Committee for National Cancer Screening Guidelines issued a recommendation against thyroid cancer screening with ultrasonography for healthy individuals.[7]

In 2017, the U.S. Preventive Services Task Force recommended against thyroid cancer screening. The Task Force’s conclusion, based on observational evidence, was that “the net benefit of screening for thyroid cancer is negative.”[2,8] The American College of Radiology does not recommend screening for thyroid cancer with imaging and, in a white paper, addressed the management of incidental nodules detected on imaging for other medical problems.[9] The American College of Radiology stated that workup was not required for incidental thyroid nodules detected on imaging if nodules were smaller than 1 cm in patients younger than 35 years and smaller than 1.5 cm in patients aged 35 years and older.

Much of what is known about the impact of thyroid cancer screening comes from South Korea’s experience. Investigators examined thyroid cancer trends in South Korea using the following three data sources:[5]

- The 2010 Korea Community Health Survey.
- The Korea Cancer Registry.
- Mortality data from Statistics Korea.

The Korea Community Health Survey asked more than 200,000 people whether they had been screened for thyroid cancer in the past 2 years. Thyroid cancer incidence from 2008 to 2010, mortality from 2007 to 2010, and the percent of people who reported thyroid cancer screening were calculated for each of the 16 administrative units of Korea, and correlations were calculated. The authors identified a strong positive correlation between rates of reported thyroid cancer screening and thyroid cancer incidence in the 16 areas (correlation coefficient [r], 0.77; 95% confidence interval [CI], 0.70–0.82). The correlation was stronger in women (r, 0.88; 95% CI, 0.83–0.92) than in men (r, 0.76; 95% CI, 0.67–0.84). However, there was no correlation between thyroid cancer incidence and mortality (r, -0.08; 95% CI, -0.59 to -0.63). Thyroid cancer screening was correlated with increased detection of papillary thyroid cancer (r, 0.74; 95% CI, 0.59–0.88) and no other histological subtypes.[5]

The South Korean data are limited because they are not experimental; however, they present a compelling argument against thyroid cancer screening in community settings. Similar trends of increased incidence without decreased mortality in other developed nations support the interpretation of the South Korean findings.[10]

### References

Bahl M, Sosa JA, Nelson RC, et al.: Trends in incidentally identified thyroid cancers over a decade: a retrospective analysis of 2,090 surgical patients. World J Surg 38 (6): 1312-7, 2014.24357246
Lin JS, Bowles EJA, Williams SB, et al.: Screening for Thyroid Cancer: Updated Evidence Report and Systematic Review for the US Preventive Services Task Force. JAMA 317 (18): 1888-1903, 2017.28492904
Cancer Research UK: Thyroid Cancer Incidence Statistics. London, UK: Cancer Research UK. Available online (http://www.cancerresearchuk.org/health-professional/cancer-statistics/statistics-by-cancer-type/thyroid-cancer/incidence#heading-Two). Last accessed December 19, 2024.
Lim H, Devesa SS, Sosa JA, et al.: Trends in Thyroid Cancer Incidence and Mortality in the United States, 1974-2013. JAMA 317 (13): 1338-1348, 2017.28362912
Ahn HS, Kim HJ, Kim KH, et al.: Thyroid Cancer Screening in South Korea Increases Detection of Papillary Cancers with No Impact on Other Subtypes or Thyroid Cancer Mortality. Thyroid 26 (11): 1535-1540, 2016.27627550
Ahn HS, Kim HJ, Welch HG: Korea's thyroid-cancer "epidemic"--screening and overdiagnosis. N Engl J Med 371 (19): 1765-7, 2014.25372084
Park S, Oh CM, Cho H, et al.: Association between screening and the thyroid cancer "epidemic" in South Korea: evidence from a nationwide study. BMJ 355: i5745, 2016.27903497
Bibbins-Domingo K, Grossman DC, Curry SJ, et al.: Screening for Thyroid Cancer: US Preventive Services Task Force Recommendation Statement. JAMA 317 (18): 1882-1887, 2017.28492905
Hoang JK, Langer JE, Middleton WD, et al.: Managing incidental thyroid nodules detected on imaging: white paper of the ACR Incidental Thyroid Findings Committee. J Am Coll Radiol 12 (2): 143-50, 2015.25456025
Vaccarella S, Franceschi S, Bray F, et al.: Worldwide Thyroid-Cancer Epidemic? The Increasing Impact of Overdiagnosis. N Engl J Med 375 (7): 614-7, 2016.27532827

## Evidence of Harm Associated With Screening

Although neck palpation and thyroid ultrasound carry very low risk, a suspicious screening result can set off a chain of events that may lead to opportunities for harms.[1,2] The next step after detection of a suspicious nodule is diagnostic evaluation with fine-needle aspiration of the lesion. The risks of thyroid fine-needle aspiration are hospitalization, postprocedural hematoma, and needle tract tumor implantation, although two observational studies suggest that the rate of each of the three outcomes is lower than 1%.[1] More importantly, the results of cytology can lead to additional tests and surgery. In a meta-analysis of 23,445 nodules that were biopsied, 60% of the nodules were benign, and 5% of the nodules were malignant. However, the remaining 35% of the nodules required repeat biopsy or surgery.[3] In patients who had a diagnostic lobectomy or excision, 64% of the nodules were benign on final histological evaluation.[3]

Thyroid surgery for benign disease has the same risks as it does for malignancy. In 2013, about 80% of surgeries for small localized papillary thyroid cancers were total thyroidectomies and 20% were lobectomies. However, the 25-year cumulative risk of death caused by thyroid cancer does not differ by type of surgery.[4] Surgical risks are lower for a lobectomy than for total thyroidectomy. In addition to the general risks of surgery, specific risks of thyroid surgery include recurrent laryngeal nerve injury and hypoparathyroidism. Recurrent laryngeal nerve injury causes vocal cord paresis, which can result in difficulty speaking, difficulty swallowing, and hoarseness. Breathing difficulties are possible if both laryngeal nerves are affected.[5,6] Hypoparathyroidism leads to hypocalcemia. A cross-sectional population-based survey included 2,632 thyroid cancer patients, 2 to 4 years after diagnosis, from two U.S. SEER registries. The study reported that 25.8% of patients had voice changes more than 3 months after surgery, and 4.7% of patients had vocal fold paralysis or paresis.[7]

A meta-analysis of hypoparathyroidism lasting more than 6 months after thyroidectomy produced a summary event measure of 3.57 per 100 procedures (95% confidence interval [CI], 2.12–5.93). Summary event measures were 1.86 per 100 procedures (95% CI, 0.84–4.04) with unilateral lymph node dissection and 3.46 per 100 procedures (95% CI, 1.20–9.56) with bilateral lymph node dissection. In Korea, the trend in the incidence rate of postoperative hypoparathyroidism paralleled that of the incidence rate of thyroid cancer, increasing from 2.6 per 100,000 in 2007 to 7.3 per 100,000 in 2012.[8] Event measures from individual studies were quite variable and, in most instances, were based on very small numbers of events; however, summary measures did not vary much by extent of thyroid or lymph node resection.[1]

A meta-analysis of laryngeal nerve palsy (a cause of unilateral vocal cord paralysis and hoarseness) lasting more than 6 months produced a summary event measure of 1.46 per 100 procedures. Although the individual study measures were less variable than those for hypoparathyroidism, the measures were based on very small numbers of events. Patients who have total thyroidectomy also require lifelong thyroid-replacement therapy and corresponding blood level monitoring.[5,6] In patients who undergo total thyroidectomy, the process of optimizing hormone replacement therapy and the resultant changes in other medications, weight, or estrogen status may cause iatrogenic hypothyroidism or hyperthyroidism.

Patients with malignant nodules have additional risks if they receive radioactive iodine therapy. Studies of harms of radioactive iodine treatment addressed the risk of second primary malignancy and permanent harms on the salivary glands. The authors concluded, from the available eight studies, that there is a small increase in primary second malignancies, of 12 to 13 excess cancers per 10,000 patients.[1] The authors expressed some concern with that estimate, though, given differences in study designs, reporting of administered doses, and the fact that changes in indication and dose had occurred over time.[1] The most-common permanent salivary adverse effect was xerostomia (dry mouth), which is a risk factor for dental caries; the percentage of affected individuals ranged from 2.3% to 35%.[1] Xerostomia increases the chance of dental decay, demineralization of teeth, tooth sensitivity, and oral infections.[9]

The harms of surgery and radioactive iodine treatments raise concerns because many of these treated cancers may not progress to cause morbidity and mortality. There are no randomized controlled trials of thyroid cancer screening that could be used to estimate overdiagnosis, but it is clear from ecological data that thyroid cancer screening results in detection of thyroid cancers that would not have been diagnosed otherwise.[10] Increases in incidence without changes in mortality in South Korea and other countries in which opportunistic thyroid cancer screening occurs cannot be explained by changes in treatment or risk factor prevalence over the years. Investigators measured thyroid cancer overdiagnosis by studying cancer registry data from high-income countries, estimating age-specific trends in thyroid cancer incidence in the 1960s before ultrasound was introduced, then comparing the shape of the age-specific curves since the 1980s.[10] The investigators reported the rate of overdiagnosis in the United States to be increasing and estimated that it accounted for 77% of thyroid cancer cases. The estimation for overdiagnosis in South Korea was 90% of thyroid cancers cases.

Autopsy studies also lend credence to overdiagnosis resulting from thyroid cancer screening.[1] A 2014 review of 15 autopsy studies reported a 12% yield of papillary thyroid cancers, although the range across studies was wide (1%–36%). Natural history studies have demonstrated the slow-growing nature of thyroid tumors, tumor stability, and low potential for recurrence.[1,11]

### References

Lin JS, Bowles EJA, Williams SB, et al.: Screening for Thyroid Cancer: Updated Evidence Report and Systematic Review for the US Preventive Services Task Force. JAMA 317 (18): 1888-1903, 2017.28492904
Bibbins-Domingo K, Grossman DC, Curry SJ, et al.: Screening for Thyroid Cancer: US Preventive Services Task Force Recommendation Statement. JAMA 317 (18): 1882-1887, 2017.28492905
Bongiovanni M, Spitale A, Faquin WC, et al.: The Bethesda System for Reporting Thyroid Cytopathology: a meta-analysis. Acta Cytol 56 (4): 333-9, 2012.22846422
Welch HG, Doherty GM: Saving Thyroids - Overtreatment of Small Papillary Cancers. N Engl J Med 379 (4): 310-312, 2018.30044933
Sandhu GS, Nouraei SAR: Laryngeal and esophageal trauma. In: Flint PW, Haughey BH, Lund V, et al., eds.: Cummings Otolaryngology—Head and Neck Surgery. 6th ed. Saunders, 2015, pp 970-81.
Smith PW, Hanks JB: Evaluation of the isolated neck mass. In: Cameron JL, Cameron AM, eds.: Current Surgical Therapy. 11th ed. Saunders, 2014, pp 718-23.
Kovatch KJ, Reyes-Gastelum D, Hughes DT, et al.: Assessment of Voice Outcomes Following Surgery for Thyroid Cancer. JAMA Otolaryngol Head Neck Surg 145 (9): 823-829, 2019.31318375
Ahn SV, Lee JH, Bove-Fenderson EA, et al.: Incidence of Hypoparathyroidism After Thyroid Cancer Surgery in South Korea, 2007-2016. JAMA 322 (24): 2441-2443, 2019.31860036
Plemons JM, Al-Hashimi I, Marek CL, et al.: Managing xerostomia and salivary gland hypofunction: executive summary of a report from the American Dental Association Council on Scientific Affairs. J Am Dent Assoc 145 (8): 867-73, 2014.25082939
Hoang JK, Langer JE, Middleton WD, et al.: Managing incidental thyroid nodules detected on imaging: white paper of the ACR Incidental Thyroid Findings Committee. J Am Coll Radiol 12 (2): 143-50, 2015.25456025
Oda H, Miyauchi A, Ito Y, et al.: Incidences of Unfavorable Events in the Management of Low-Risk Papillary Microcarcinoma of the Thyroid by Active Surveillance Versus Immediate Surgery. Thyroid 26 (1): 150-5, 2016.26426735

## Latest Updates to This Summary (04/07/2025)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Incidence and Mortality

Updated statistics with estimated new cases and deaths for 2025 (cited American Cancer Society as reference 1).

Risk Factors

Added American Cancer Society as reference 6.

This summary is written and maintained by the PDQ Screening and Prevention Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/screening-prevention), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about thyroid cancer screening. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Screening and Prevention Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/screening-prevention), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Screening and Prevention Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Screening and Prevention Editorial Board. PDQ Thyroid Cancer Screening. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/thyroid/hp/thryoid-screening-pdq. Accessed <MM/DD/YYYY>. [PMID: 28876831]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).